# Smoking in Cancer Care (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the risks of continued smoking in cancer patients and about quitting patterns and cessation intervention in these patients. It is intended as a resource to inform and assist clinicians who care for cancer patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

This summary briefly covers smoking as a primary risk factor for cancer, but the main focus is on the effect of smoking on recurrence or on diagnosis of a second primary cancer; patterns of quitting and continued smoking in cancer patients; and recommendations for smoking intervention for cancer patients. This information will assist health professionals caring for patients during and after treatment. Substantial material on cancer prevention and smoking cessation in the general population is available elsewhere. Because virtually all the available evidence pertains to cigarettes rather than other forms of tobacco, such as snuff or chewing tobacco, reference is made to smoking cigarettes rather than to tobacco use.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

## Smoking as a Primary Risk Factor

The relationships between tobacco use and cancers of the lung and head and neck have been established for almost 50 years. Of the estimated 53,000 cases of head and neck cancer diagnosed each year, 85% are associated with tobacco use. The relative attributable risk of morbidity from smoking for lung cancer is more than 90%; it is between 60% and 70% for other smoking-related cancers (larynx, oral cavity, esophagus, bladder, kidney, pancreas, and other urinary cancers).[1] Evidence suggests that smoking before age 30 years is a strong risk factor for colorectal cancer, with the risk appearing after a very long induction period (>35 years) in both men [2] and women.[3]

Smokers may also be at increased risk of regional and metastatic disease at diagnosis.[4] In one study, smoking worsened the course or outcome of acute myeloid leukemia, particularly in younger patients and those with unfavorable karyotypes.[5] A study of renal cell carcinoma patients suggests that improvement in renal cell carcinoma risk after smoking cessation may be relatively linear but may take more than 20 years to reduce risk to that of a nonsmoker.[6]

Smoking contributes to cancer development by causing mutations in tumor suppressor genes and dominant oncogenes and by impairing mucociliary clearance in the lungs and decreasing immunologic response.[7] (Refer to the PDQ summary on Lung Cancer Prevention for more information.)

### References

Shopland DR, Burns DM, Garfinkel L, et al.: Monograph 8: Changes in Cigarette-Related Disease Risks and Their Implications for Prevention and Control. Bethesda, Md: National Institutes of Health, National Cancer Institute, NIH Publ No 97-4213, 1997.
Giovannucci E, Rimm EB, Stampfer MJ, et al.: A prospective study of cigarette smoking and risk of colorectal adenoma and colorectal cancer in U.S. men. J Natl Cancer Inst 86 (3): 183-91, 1994.8283490 94111154
Giovannucci E, Colditz GA, Stampfer MJ, et al.: A prospective study of cigarette smoking and risk of colorectal adenoma and colorectal cancer in U.S. women. J Natl Cancer Inst 86 (3): 192-9, 1994.8283491 94111155
Kobrinsky NL, Klug MG, Hokanson PJ, et al.: Impact of smoking on cancer stage at diagnosis. J Clin Oncol 21 (5): 907-13, 2003.12610192
Chelghoum Y, Danaïla C, Belhabri A, et al.: Influence of cigarette smoking on the presentation and course of acute myeloid leukemia. Ann Oncol 13 (10): 1621-7, 2002.12377652
Parker AS, Cerhan JR, Janney CA, et al.: Smoking cessation and renal cell carcinoma. Ann Epidemiol 13 (4): 245-51, 2003.12684190 22570559
Carbone D: Smoking and cancer. Am J Med 93 (1A): 13S-17S, 1992.1496998 92359121

## Poorer Treatment Response in Cancer Patients

Evidence exists for substantial medical advantage to an individual quitting smoking once cancer is diagnosed. There is substantial evidence that continued smoking may reduce the effectiveness of treatment and increase the likelihood of a second cancer. (Refer to the Smoking as a Risk Factor for Second Malignancy section of this summary for more information.) Continued smoking may also worsen side effects of treatment,[1] although the direct evidence for this is surprisingly limited because few studies have evaluated this issue.

If one extrapolates from the extensive evidence of the effects of smoking on cardiovascular disease, pulmonary functioning, immunosuppression, and wound healing due to vasoconstriction and the fairly rapid reduction of some effects after smoking cessation,[2,3] these results might also apply to cancer patients, particularly if surgical management or lung functioning is involved. For example, one study outlined a model of cardiopulmonary toxicities in response to various antineoplastic therapies that may be potentiated by tobacco use. More specifically, smokers treated with bleomycin or carmustine showed higher levels of pulmonary fibrosis and restrictive lung disease, and the anthracyclines led to higher risk of cardiomyopathy in smokers.[4]

In a study of patients with advanced head and neck cancer who underwent radiation therapy,[5] patients who continued to smoke during radiation therapy suffered mucositis for a longer time (23.4 weeks) than did patients who quit at the time of radiation therapy and remained abstinent (13.6 weeks) or patients who remained abstinent for at least a month after treatment (18.3 weeks). Extended mucositis may be associated with permanent alteration in appearance. Studies show that perioperative and long-term complications are considerably higher in patients with head and neck cancer who continue to smoke.[6] In one study, patients receiving induction chemotherapy for acute myeloid leukemia who continued to smoke were more likely to experience severe pulmonary infection (26% vs. 18%), although overall survival rates did not differ in adults older than 60 years.[7] After radiation therapy for laryngeal carcinoma, patients who continue to smoke may be less likely to regain satisfactory voice quality.[8]

Another area of reasonable concern for patients who continue to smoke is the rate of general complications after any type of surgery. It is documented that wound healing postsurgery is slowed in smokers because both nicotine and carbon monoxide cause vasoconstriction, inhibition of epithelization, and creation of cellular hypoxia.[9,10] In one study of predictors of complications after resection in lung cancer patients, a history of smoking doubled the likelihood of complications, but smoking at the time of admission for surgery did not.[11] However, no detailed information on the time since smoking had ceased was provided.

One study found decreased response rates and survival rates in patients with head and neck cancer who continued to smoke during treatment. Patients who continued to smoke had a significantly lower rate of complete response to radiation therapy (45% vs. 74%) and 2-year survival (39% vs. 66%). Recent quitters were more similar to long-term quitters than to continued smokers in survival likelihood at 18 months.[12]

Another study also showed an effect of continued smoking on survival rates in patients with head and neck cancer.[13] Those who stopped smoking doubled their chance of survival, irrespective of extent of disease at diagnosis; after 2 years, survival of quitters approached that of nonsmokers. Relative risk of recurrence in quitters was about double that of nonsmokers; in those who continued to smoke after diagnosis, relative risk of recurrence quadrupled, regardless of the amount they smoked. One study failed to find significant differences in prognosis in resected stage I non-small cell lung cancer patients on the basis of smoking status; the recurrence and death rates in both former and current smokers did not differ but were double to triple the rates in newer smokers.[14] These differences failed, however, to reach statistical significance because of the small number of newer smokers; in addition, the lack of differences between former versus current smokers was hard to interpret because no definitions were provided.

In another study, a consistent trend was found in patients with small cell cancer: continued smokers had the poorest survival, followed by patients who quit at diagnosis, then by patients who had quit on average 2.5 years before diagnosis.[15] Although survival curves of recent ex-smokers did not differ statistically from continued smokers, perhaps because of small numbers, no continued smokers (n = 57) survived past 131 weeks, whereas six of those who quit at diagnosis (n = 35) were in complete remission at 1 and 2 years.

The relationships between smoking, disease recurrence, and mortality rates for prostate cancer have been examined. Studies have found an association between continued smoking and earlier recurrence [16,17] and increased mortality.[18] In a study of 1,416 men who underwent radical prostatectomy, recurrence occurred after a mean of 7.3 years in 34.3% of current smokers, 14.8% of former smokers, and 12.1% of those who had never smoked.[17] Another study found higher 5-year mortality rates in patients with stage D2 disease (88% vs. 63%) and non–stage A disease (39% vs. 17%).[16] In a prospective observational study of 5,366 men, prostate cancer–specific death rates were 15.3 per 1,000 person-years for current smokers versus 9.6 per 1,000 person-years for those who had never smoked. Prostate cancer patients who quit smoking for 10 years or longer had mortality rates similar to those of nonsmokers.[18]

### References

Des Rochers C, Dische S, Saunders MI: The problem of cigarette smoking in radiotherapy for cancer in the head and neck. Clin Oncol (R Coll Radiol) 4 (4): 214-6, 1992.1622882 92322555
U.S. Department of Health and Human Services: The Health Benefits of Smoking Cessation. A Report of the Surgeon General. Rockville, Md: 1990. DHHS Publ No. (CDC) 90-8416.
U.S. Department of Health and Human Services: A Report of the Surgeon General: How Tobacco Smoke Causes Disease: What It Means to You. Atlanta, Ga: U.S. Department of Health and Human Services, Centers for Disease Control and Prevention, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2010. Also available online (http://www.cdc.gov/tobacco/data_statistics/sgr/2010/consumer_booklet/pdfs/consumer.pdf). Last accessed June 12, 2014.
Tyc VL, Hudson MM, Hinds P, et al.: Tobacco use among pediatric cancer patients: recommendations for developing clinical smoking interventions. J Clin Oncol 15 (6): 2194-204, 1997.9196131 97339532
Rugg T, Saunders MI, Dische S: Smoking and mucosal reactions to radiotherapy. Br J Radiol 63 (751): 554-6, 1990.2390690 90360188
Wein RO: Preoperative smoking cessation: impact on perioperative and long-term complications. Arch Otolaryngol Head Neck Surg 135 (6): 597-601, 2009.19528409
Chelghoum Y, Danaïla C, Belhabri A, et al.: Influence of cigarette smoking on the presentation and course of acute myeloid leukemia. Ann Oncol 13 (10): 1621-7, 2002.12377652
Karim AB, Snow GB, Siek HT, et al.: The quality of voice in patients irradiated for laryngeal carcinoma. Cancer 51 (1): 47-9, 1983.6821807 83102672
Gritz ER, Kristeller J, Burns DM: Treating nicotine addiction in high-risk groups and patients with medical co-morbidity. In: Orleans CT, Slade J, eds.: Nicotine Addiction: Principles and Management. New York, NY: Oxford University Press, 1993, pp 279-309.
U.S. Department of Health and Human Services: The Health Consequences of Smoking: Cardiovascular Disease. A Report of the Surgeon General. Rockville, Md.: DHHS Publication No. (PHS) 84-50204, 1983.
Kearney DJ, Lee TH, Reilly JJ, et al.: Assessment of operative risk in patients undergoing lung resection. Importance of predicted pulmonary function. Chest 105 (3): 753-9, 1994.8131537 94177998
Browman GP, Wong G, Hodson I, et al.: Influence of cigarette smoking on the efficacy of radiation therapy in head and neck cancer. N Engl J Med 328 (3): 159-63, 1993.8417381 93109406
Stevens MH, Gardner JW, Parkin JL, et al.: Head and neck cancer survival and life-style change. Arch Otolaryngol 109 (11): 746-9, 1983.6639443 84051995
Gail MH, Eagan RT, Feld R, et al.: Prognostic factors in patients with resected stage I non-small cell lung cancer. A report from the Lung Cancer Study Group. Cancer 54 (9): 1802-13, 1984.6478416 85001784
Johnston-Early A, Cohen MH, Minna JD, et al.: Smoking abstinence and small cell lung cancer survival. An association. JAMA 244 (19): 2175-9, 1980.6252357 81028556
Daniell HW: A worse prognosis for smokers with prostate cancer. J Urol 154 (1): 153-7, 1995.7776411 95295045
Joshu CE, Mondul AM, Meinhold CL, et al.: Cigarette smoking and prostate cancer recurrence after prostatectomy. J Natl Cancer Inst 103 (10): 835-8, 2011.21498781
Kenfield SA, Stampfer MJ, Chan JM, et al.: Smoking and prostate cancer survival and recurrence. JAMA 305 (24): 2548-55, 2011.21693743

## Smoking as a Risk Factor for Second Malignancy

Persons who initially present with both smoking-related and non–smoking-related malignancy face increased risk of a second malignancy at the same site or another site if they continue to smoke.[1,2] When prognosis is more favorable for the initial cancer, the evidence is even stronger that continued smoking increases the risk of new primary cancers for up to 20 years after original diagnosis. In two studies of survivors of small cell lung cancer (SCLC) (mostly stage I and II),[3-5] risk of a second cancer (mostly non-SCLC [NSCLC]) was 3.5-fold to 4.4-fold higher than in the general population. In those who continued to smoke, the risk was far higher, particularly in those who also received chest irradiation (relative risk [RR] = 21.0) and alkylating agents (RR = 19.0).[4] In individuals who stopped smoking at the time of diagnosis, the risk was no higher than in those who had stopped smoking at least 6 months before diagnosis.

In a study of breast cancer survivors who subsequently developed lung cancer,[6] the risk of subsequent lung cancer in those who were treated with thoracic radiation therapy (XRT) alone was negligible, whereas the risk attributable to smoking was substantial (adjusted odds ratio [OR] = 5.6) and even higher for a combination of XRT and smoking (unadjusted OR = 9.0, P < .05; adjusted OR = 8.6, P = .08). Even higher multiplicative risk of subsequent lung cancer from radiation treatment and smoking (RR = 20.2) was identified in a study of Hodgkin lymphoma survivors,[7] which found higher multiplicative effects (RR = 49.1) for a combination of radiation and alkylating agents in moderate to heavy smokers compared with other cases. Another study in Japan confirmed that patients with SCLC who survive at least 2 years greatly reduced their likelihood of a second cancer if they quit smoking.[8]

Patients with oral and pharyngeal cancers who smoke also have an exceptionally high rate of second primary cancers. A follow-up study of more than 1,000 patients with oral cancers found that the risk of a second cancer increased with continued smoking up to almost five times as much (OR = 4.7) for all aerodigestive cancers among long-term heavy smokers (two packs or more per day), even after controlling for alcohol, which carries its own excess risk. No effect was seen for quitting within 2 years, but risk decreased significantly after 5 years' cessation.[9] Another study [10] confirmed this increased risk, although at a somewhat lower level. More than 1,000 patients with early-stage head and neck squamous cell carcinoma were examined for the joint effects of tobacco and alcohol exposure on second primary tumors (SPT) up to 6 years after initial diagnosis. SPT cases were more likely to be current smokers (27.5% vs. 18.8%) who smoked more for a longer period and used forms of tobacco other than cigarettes or in combination with cigarettes. Overall risk of SPT was approximately double for smokers. Most increased risk was associated with continued smoking (RR = 2.1) and alcohol intake (RR = 1.3) after diagnosis, although no interaction effect was evident.

The relationship between smoking and progression of prostate cancer has been documented. One study found a much higher 5-year tumor-specific mortality rate among smokers with stage D2 disease (88% vs. 63%) or non–stage A disease (39% vs. 17%), which was attributed to immunosuppressive effects of continued smoking.[11] The impact of smoking on risk of a secondary lung cancer has been demonstrated in survivors of Hodgkin lymphoma.[7,12] Studies conducted in patients with primary cancers have also shown decreased risk of second malignancy and improved survival as a result of smoking cessation.[13,14]

### References

Gritz ER, Fingeret MC, Vidrine DJ, et al.: Successes and failures of the teachable moment: smoking cessation in cancer patients. Cancer 106 (1): 17-27, 2006.16311986
Parsons A, Daley A, Begh R, et al.: Influence of smoking cessation after diagnosis of early stage lung cancer on prognosis: systematic review of observational studies with meta-analysis. BMJ 340: b5569, 2010.20093278
Richardson GE, Tucker MA, Venzon DJ, et al.: Smoking cessation after successful treatment of small-cell lung cancer is associated with fewer smoking-related second primary cancers. Ann Intern Med 119 (5): 383-90, 1993.8393311 93332317
Tucker MA, Murray N, Shaw EG, et al.: Second primary cancers related to smoking and treatment of small-cell lung cancer. Lung Cancer Working Cadre. J Natl Cancer Inst 89 (23): 1782-8, 1997.9392619 98052512
Johnson BE: Second lung cancers in patients after treatment for an initial lung cancer. J Natl Cancer Inst 90 (18): 1335-45, 1998.9747865 98418637
Ford MB, Sigurdson AJ, Petrulis ES, et al.: Effects of smoking and radiotherapy on lung carcinoma in breast carcinoma survivors. Cancer 98 (7): 1457-64, 2003.14508833
Travis LB, Gospodarowicz M, Curtis RE, et al.: Lung cancer following chemotherapy and radiotherapy for Hodgkin's disease. J Natl Cancer Inst 94 (3): 182-92, 2002.11830608 21819103
Kawahara M, Ushijima S, Kamimori T, et al.: Second primary tumours in more than 2-year disease-free survivors of small-cell lung cancer in Japan: the role of smoking cessation. Br J Cancer 78 (3): 409-12, 1998.9703291 98366851
Day GL, Blot WJ, Shore RE, et al.: Second cancers following oral and pharyngeal cancers: role of tobacco and alcohol. J Natl Cancer Inst 86 (2): 131-7, 1994.8271296 94096420
Do KA, Johnson MM, Doherty DA, et al.: Second primary tumors in patients with upper aerodigestive tract cancers: joint effects of smoking and alcohol (United States). Cancer Causes Control 14 (2): 131-8, 2003.12749718
Daniell HW: A worse prognosis for smokers with prostate cancer. J Urol 154 (1): 153-7, 1995.7776411 95295045
Abrahamsen JF, Andersen A, Hannisdal E, et al.: Second malignancies after treatment of Hodgkin's disease: the influence of treatment, follow-up time, and age. J Clin Oncol 11 (2): 255-61, 1993.8426202 93147857
Chen CH, Shun CT, Huang KH, et al.: Stopping smoking might reduce tumour recurrence in nonmuscle-invasive bladder cancer. BJU Int 100 (2): 281-6; discussion 286, 2007.17419696
Geyer SM, Morton LM, Habermann TM, et al.: Smoking, alcohol use, obesity, and overall survival from non-Hodgkin lymphoma: a population-based study. Cancer 116 (12): 2993-3000, 2010.20564404

## Effects of a Cancer Diagnosis on Quitting Smoking and Remaining Abstinent

Despite strong evidence about the deleterious effects of continued smoking in cancer patients, smoking cessation remains a challenging issue in this patient population, especially in patients with comorbid mental health issues and substance use disorders.[1-3] Most patients with a smoking-related cancer make serious efforts to quit at the time of diagnosis.[4-7] Studies suggest that approximately one-half of a group of patients with oral and pharyngeal cancers quit at or after diagnosis;[8,9] heavier smokers were substantially more likely to quit. Another study found a 12-month abstinence rate of 64.6% among head and neck cancer patients.[5] A quit rate of 52% was reported in 115 head and neck cancer patients just before diagnosis, suggesting that an increase in smoking and cancer-related symptoms drives a substantial part of the decision to quit smoking, in addition to knowledge of the diagnosis.[10]

Even patients who continue to smoke may remain motivated to quit. In a group of stage I small cell lung cancer patients, almost 90% had made one or more attempts to quit smoking, although 60% of survivors still smoked at 2 years.[4] In another study, 84% of the sample had made at least one attempt to quit since surgery, and 69% had made multiple attempts.[6] These studies found that while 80% of larynx and pharynx cancer patients remained abstinent after surgery, only 20% of those with oral cavity cancers did so. Patients who had undergone less intensive treatment (in particular, radiation therapy) were more likely to remain smokers; if they quit, they were 2.46 times more likely to resume tobacco use, even after controlling for severity. Higher relapse rates have also been associated with less radical treatment of head and neck cancers.[11]

Such a relationship between continued smoking and less severe disease has also been found in cardiac patients.[12] Another group in which secondary prevention may be particularly important is survivors of childhood cancer. In pediatric cancer survivors, initiation of smoking may be as high as in a group of healthy peers. An excellent review of the findings and recommendations in addressing smoking in this population has been published.[13]

### References

Nayan S, Gupta MK, Strychowsky JE, et al.: Smoking cessation interventions and cessation rates in the oncology population: an updated systematic review and meta-analysis. Otolaryngol Head Neck Surg 149 (2): 200-11, 2013.23715685
Schnoll RA, Martinez E, Langer C, et al.: Predictors of smoking cessation among cancer patients enrolled in a smoking cessation program. Acta Oncol 50 (5): 678-84, 2011.21534846
Blalock JA, Lam C, Minnix JA, et al.: The effect of mood, anxiety, and alcohol use disorders on smoking cessation in cancer patients. J Cogn Psychother 25 (1): 82-96, 2011.
Gritz ER, Nisenbaum R, Elashoff RE, et al.: Smoking behavior following diagnosis in patients with stage I non-small cell lung cancer. Cancer Causes Control 2 (2): 105-12, 1991.1651777 91338396
Gritz ER, Carr CR, Rapkin D, et al.: Predictors of long-term smoking cessation in head and neck cancer patients. Cancer Epidemiol Biomarkers Prev 2 (3): 261-70, 1993 May-Jun.8318879 93306182
Ostroff JS, Jacobsen PB, Moadel AB, et al.: Prevalence and predictors of continued tobacco use after treatment of patients with head and neck cancer. Cancer 75 (2): 569-76, 1995.7812925 95112247
Vander Ark W, DiNardo LJ, Oliver DS: Factors affecting smoking cessation in patients with head and neck cancer. Laryngoscope 107 (7): 888-92, 1997.9217125 97360097
Day GL, Blot WJ, Shore RE, et al.: Second cancers following oral and pharyngeal cancers: role of tobacco and alcohol. J Natl Cancer Inst 86 (2): 131-7, 1994.8271296 94096420
Duffy SA, Khan MJ, Ronis DL, et al.: Health behaviors of head and neck cancer patients the first year after diagnosis. Head Neck 30 (1): 93-102, 2008.17685451
Browman GP, Wong G, Hodson I, et al.: Influence of cigarette smoking on the efficacy of radiation therapy in head and neck cancer. N Engl J Med 328 (3): 159-63, 1993.8417381 93109406
Gritz ER, Schacherer C, Koehly L, et al.: Smoking withdrawal and relapse in head and neck cancer patients. Head Neck 21 (5): 420-7, 1999.10402522 99332282
Ockene J, Kristeller JL, Goldberg R, et al.: Smoking cessation and severity of disease: the Coronary Artery Smoking Intervention Study. Health Psychol 11 (2): 119-26, 1992.1582380 92258345
Tyc VL, Hudson MM, Hinds P, et al.: Tobacco use among pediatric cancer patients: recommendations for developing clinical smoking interventions. J Clin Oncol 15 (6): 2194-204, 1997.9196131 97339532

## Smoking Intervention in Cancer Patients

Surprisingly few smoking intervention studies have been conducted with cancer patients. Many patients report quitting smoking at the time of diagnosis, and many others have comorbidities that prevent enrollment in clinical trials, yet little is known about routine smoking cessation services in an oncology setting. Thus, a smoking cessation feasibility study reported on implementation issues.[1] In this study, 14,514 adult cancer patients were screened as potential participants, with fewer than 2% of patients determined to be eligible. Barriers to enrollment and exclusion criteria included the following:

- Nonsmoker status (83%).
- Contraindicated medical history (e.g., serious cardiovascular problem) (5%).
- Not interested in quitting smoking (4%).
- Current psychiatric condition (e.g., alcohol dependence, any Axis I disorder) (0.1%).
- Other (e.g., unreachable by phone, too far to travel, died, non-English speaker, current medication contraindicated) (7.2%).

Eighty-four percent of eligible patients enrolled. Patients who declined enrollment were more likely than those who enrolled to have advanced disease. Patients who enrolled had extensive smoking histories (mean, 38 years), scored very high on measures of nicotine dependence, and averaged about seven drinks per week; about one-quarter of enrollees reported clinical levels of depressive symptoms. Researchers concluded that integrating a smoking cessation program into routine clinical care is feasible, although challenging, and that particular attention should be given to the subpopulation of smokers who also experience depression.[1] Other studies also suggest lower cessation rates in patients with depression and alcohol use disorders.[2,3]

Another study found that when consistent intervention was provided to a group of patients with head and neck cancer, about 65% were able to quit and remain abstinent, including about one-half of patients who expressed little interest in quitting at baseline.[4][Level of evidence: I] A large intervention study with head and neck cancer patients used surgeon- or dentist-delivered advice to stop smoking, contracted quit dates, written materials, and booster advice sessions. Partially because of a high drop-out rate, a significant intervention effect was not detected, although differences were in the expected direction.[4] A similar study [5][Level of evidence: I] also failed to find beneficial effects for very brief (<5 minutes) physician-delivered interventions based on the Ask, Advise, Assist, Arrange model outlined below. More than 400 cancer patients with a range of diagnoses were randomly assigned to receive either intervention or usual care. Approximately one-half had been diagnosed within the previous 6 months; 46.3% had tried to quit in the previous 6 months; and 84% were considering quitting in the following 6 months. Patients randomly assigned to the intervention group acknowledged receiving advice and resources from their physician consistent with the protocol; however, there were no significant differences in quit rates at either 6-month follow-up (11.9% vs. 14.4%) or 12-month follow-up (13.6% vs. 13.3%). Patients were more likely to quit smoking if they had been diagnosed with head and neck cancer or lung cancer, were lighter smokers, expressed a strong desire to quit, and used additional intervention resources. These results suggest that very brief physician counseling for this high-risk group is not adequate to improve quit rates.

A case-controlled retrospective study [6][Level of evidence: III] examined the effects of referral to a nicotine dependence center for more than 200 smokers diagnosed with lung cancer compared with smokers without a lung cancer diagnosis. Most lung cancer patients were less likely to have made previous attempts to quit smoking but expressed higher motivation to quit than did individuals without lung cancer. Although the likelihood of being abstinent at 6 months postintervention was higher among lung cancer patients (22% vs. 14%), after adjusting for demographic variables and level of motivation, there was no statistically significant difference. Patients who were closer to diagnosis at the time of intervention were far more likely to be abstinent at 6 months (27.3% vs. 0% for 3–6 months vs. 7% for >6 months, P = .01). In general, a brief smoking intervention consisting of approximately 1 hour of tailored intervention, including prescription of pharmacologic treatment, showed relatively little impact in this high-risk population. However, referral sooner after diagnosis may increase the likelihood of quitting. This study is limited by the self-selection of patients and lack of a nonintervention comparison group.

Considerable work has been done, however, with other patient groups—particularly cardiac patients—in establishing the valuable role of physicians and other health care providers in providing smoking intervention in the context of medical care. Specific recommendations for intervening in tobacco use have been published in several contexts. On the basis of outcomes from six major clinical trials of physician-delivered smoking intervention conducted in the late 1980s,[7] the Ask, Advise, Assist, Arrange model was developed. In this model, the physician provides a brief intervention that entails asking about smoking status at every visit, advising abstinence, assisting by setting a quit date, providing self-help materials, recommending the use of nicotine replacement therapy, and arranging for a follow-up visit. See the list below for brief and expanded intervention outlines. The Patient-Centered Counseling Key Elements list below provides detailed questions that may be asked in the assist phase in a patient-centered counseling format that is brief enough (5–7 minutes) to be delivered within the context of a usual office visit.[8][Level of evidence: I]

These recommendations form the core of the Public Health Service–sponsored Clinical Practice Guideline [9][Level of evidence: IV];[10] that extended the recommendations by strongly supporting the value of referral to more intensive counseling. Furthermore, in addition to the documented value of nicotine replacement therapy (using gum, lozenge, patch, nasal spray, or inhaler), there is now clear evidence for the value of the antidepressant bupropion HCl (Wellbutrin SR and Zyban), 150 mg twice a day, as an adjunct for treatment;[11] however, these adjunctive pharmacological treatments have not been tested in cancer patients. Individuals should be advised to check with their physicians.

Not all smokers are equally motivated to stop smoking. One of the most useful models for physicians in understanding the motivational issues in stopping smoking and actually quitting is the Stages of Change Model.[9] Most individuals attempting to change a complex behavior such as smoking go through several predictable stages, from precontemplation to contemplation to preparation and, finally, to action. One of the goals of brief physician counseling is to move patients along these stages, until they are more motivated to quit. In addition, especially for first-time quitters, relapsing and cycling through these stages one or more times is common, until the person develops better behavioral skills.

The most common triggers for relapse are stressful situations and social triggers for smoking. One study found that the patterns of relapse in head and neck cancer patients were comparable to patterns of relapse in quitters in the general population.[12][Level of evidence: II] Smokers should be encouraged to anticipate such situations and develop strategies for handling them, as part of developing a new identity as a nonsmoker. It may take more than a year for even motivated smokers to successfully make these changes. The Stages of Change Model is well described and summarized [9] and is outlined as part of the Ask, Advise, Assist, Arrange Key Elements list below. Other important information such as smoking history (e.g., amount smoked or previous attempts to quit) can be efficiently collected by asking patients to complete a brief set of self-assessment forms in the waiting room. Nicotine addiction can be assessed using the Fagerstrom Test for Nicotine Dependence (FTND), and behavioral patterns (e.g., tendency to smoke when under stress) can be assessed using the online booklet titled Clearing the Air (http://smokefree.gov/sites/default/files/pdf/clearing-the-air-accessible.pdf). When talking with patients about smoking cessation, providers can use a fact sheet (http://www.cdc.gov/tobacco/data_statistics/sgr/2010/clinician_sheet/pdfs/clinician.pdf) available from the Centers for Disease Control and Prevention.

Psychiatric disorders and alcohol abuse may be complicating factors in the treatment of smoking, regardless of the population. Smoking prevalence is notably higher among those with mental or alcohol disorders,[13,14] and response to treatment is poorer.[15,16]

A comprehensive longitudinal study [3] of all patients (N = 1,425) seen over a 3-year period at the MD Anderson Cancer Center Tobacco Treatment Program identified individuals with major depression (n = 194), an anxiety disorder (n = 53), alcohol abuse (n = 92), or combinations of these disorders (n = 255), with the remainder (n = 831) having no psychiatric diagnosis. Across groups, individuals smoked an average of one pack per day. Patients received an individually tailored behavioral intervention, generally consisting of an in-person initial evaluation and an average of eight treatment sessions over 3 to 4 months, either in person or by phone, with follow-up at 6 months. Smoking-related pharmacotherapy was part of treatment for 88% of participants; about 15% also received a consultation with the program's addiction psychiatrist.

Individuals with no psychiatric diagnosis had abstinence rates of 44% at the end of the program and 45.1% at 6 months. Abstinence rates for clinical groups at 6 months varied, as follows:[3]

- 30.2% for those with combined anxiety, depression, and alcohol abuse.
- 33.7% for those with alcohol abuse alone.
- 37.6% for those with major depression.
- 45.3% for those with only an anxiety disorder.

Regardless of the diagnosis, the best predictor of extended abstinence was the FTND (overall average score, 4.9 [standard deviation, 2.2]; group range, 4.7 [no diagnosis] to 5.4 [major depression]). The overall conclusion is that in an intensive comprehensive program for cancer patients who are smokers, such as the program offered at MD Anderson, individuals with an anxiety disorder are likely to do as well as individuals without any diagnosis, but those with major depression or alcohol abuse may do more poorly, particularly if their FTND scores are higher.

Tailoring intervention for specific populations may also be important, although this has not been examined specifically in cancer patients. A study of the effects of self-help intervention materials designed for an African American population showed higher quit rates (25%) among those who received the tailored materials than among those who received the standard materials (15.4%) at 12 months postintervention.[17][Level of evidence: I]

Other investigators have begun to examine intervention approaches specific to patients at high risk of developing lung cancer, through the use of genetic biomarker feedback (presence of the CYP2D6 genetic abnormality, which increases the risk of developing lung cancer twofold to fourfold) in otherwise healthy smokers. Adding information on genetic risk of cancer to the usual counseling approaches increased initial quit rates significantly, but this effect was not maintained; such an approach may be a useful motivational component to add to a more comprehensive intervention but may not be sufficient in itself.[18][Level of evidence: I]

Ask, Advise, Assist, Arrange Key Elements
A. Ask/Assessment:
  - Minimal assessment: Screen for smoking status at every visit or at admission.
  - Augmented assessment: Assess characteristics of smoking history and patterns.
    - Amount smoked.
    - Quit history.
    - Stage of change:
      - Precontemplator: Is not seriously considering stopping smoking.
      - Contemplator: Is seriously considering stopping within 3 to 6 months.
      - Preparation: Is seriously considering stopping within the next week to month, and has already made changes such as cutting back.
      - Action: Has recently stopped smoking (within last 6 months).
      - Relapse: Has quit for at least 48 hours but is smoking again.
      - Maintenance: Has quit for at least 6 months but may still be vulnerable to a relapse up to 1 year.
  - Nicotine addiction: Fagerstrom Test for Nicotine Dependence.
  - Behavioral patterns: Online booklet titled Clearing the Air (http://smokefree.gov/sites/default/files/pdf/clearing-the-air-accessible.pdf).
B. Advise:
  - Minimal advice: “As your physician, I must advise you that smoking is bad for your health, and it would be important for you to stop.”
  - Augmented advice: “Because of your (__________) condition, it is particularly important for you to stop. If you stop now, (briefly educate patient about basic health benefits from quitting).”
C. Assist/Counsel:
  - Minimal assistance: Provide self-help materials; assess interest in quitting; assess interest in and appropriateness of pharmacological aids.
  - Augmented assistance: Provide brief 5- to 7-minute patient-centered counseling. See the list below for an outline of the counseling content.
D. Arrange follow-up support:
  - Minimal follow-up support: Arrange for single follow-up contact by visit or by telephone in about 2 weeks; provide referral to a smoking counselor or group.
  - Extended follow-up support: Establish quit-smoking contract with quit date. Arrange three or more follow-up contacts by visit or by telephone.

Patient-Centered Counseling Key Elements
A. Motivation:
  - Basic question:
    - “How do you feel about your smoking?”
  - Follow-up questions:
    - “How do you feel about stopping smoking?”
    - “Have you ever tried to stop before?” “What happened?”
    - “What do you like about smoking?”
    - “What do you not like about smoking?”
B. Anticipated problems:
  - Basic question:
    - “What problems will you have if you stop smoking?”
  - Follow-up questions:
    - “Anything else?”
    - According to My Quit Journal (available in the online booklet titled Clear Pathways (http://smokefree.gov/sites/default/files/pdf/clearpathways508c.pdf)), your craving level was highest when you were (_____). How do you think you can handle that type of situation?”
C. Resources for coping with problems:
  - Basic question:
    - “How do you think you can handle that?”
  - Follow-up questions:
    - “What else could you do?”
    - “How do you expect your (family/spouse/friends) to help you?”

### References

Martinez E, Tatum KL, Weber DM, et al.: Issues related to implementing a smoking cessation clinical trial for cancer patients. Cancer Causes Control 20 (1): 97-104, 2009.18758971
Schnoll RA, Martinez E, Langer C, et al.: Predictors of smoking cessation among cancer patients enrolled in a smoking cessation program. Acta Oncol 50 (5): 678-84, 2011.21534846
Blalock JA, Lam C, Minnix JA, et al.: The effect of mood, anxiety, and alcohol use disorders on smoking cessation in cancer patients. J Cogn Psychother 25 (1): 82-96, 2011.
Gritz ER, Carr CR, Rapkin D, et al.: Predictors of long-term smoking cessation in head and neck cancer patients. Cancer Epidemiol Biomarkers Prev 2 (3): 261-70, 1993 May-Jun.8318879 93306182
Schnoll RA, Zhang B, Rue M, et al.: Brief physician-initiated quit-smoking strategies for clinical oncology settings: a trial coordinated by the Eastern Cooperative Oncology Group. J Clin Oncol 21 (2): 355-65, 2003.12525530
Sanderson Cox L, Patten CA, Ebbert JO, et al.: Tobacco use outcomes among patients with lung cancer treated for nicotine dependence. J Clin Oncol 20 (16): 3461-9, 2002.12177107
Glynn TJ, Manley MW, Pechacek TF: Physician-initiated smoking cessation program: the National Cancer Institute trials. Prog Clin Biol Res 339: 11-25, 1990.2118257 90363766
Ockene JK, Kristeller J, Goldberg R, et al.: Increasing the efficacy of physician-delivered smoking interventions: a randomized clinical trial. J Gen Intern Med 6 (1): 1-8, 1991 Jan-Feb.1999742 91154925
Prokhorov AV, Hudmon KS, Gritz ER: Promoting smoking cessation among cancer patients: a behavioral model. Oncology (Huntingt) 11 (12): 1807-13; discussion 1813-4, 1997.9436187 98098582
Fiore MC, Jaén CR, Baker TB, et al.: Treating Tobacco Use and Dependence: 2008 Update. Quick Reference Guide for Clinicians. Rockville, Md: Public Health Service, U.S. Department of Health and Human Services, 2009. Also available online (http://www.ahrq.gov/legacy/clinic/tobacco/tobaqrg.pdf). Last accessed June 12, 2014.
Cinciripini PM, McClure JB: Smoking cessation: recent developments in behavioral and pharmacologic interventions. Oncology (Huntingt) 12 (2): 249-56, 259; discussion 260, 265, 2, 1998.9507525 98168368
Gritz ER, Schacherer C, Koehly L, et al.: Smoking withdrawal and relapse in head and neck cancer patients. Head Neck 21 (5): 420-7, 1999.10402522 99332282
Lawrence D, Mitrou F, Zubrick SR: Smoking and mental illness: results from population surveys in Australia and the United States. BMC Public Health 9: 285, 2009.19664203
Lasser K, Boyd JW, Woolhandler S, et al.: Smoking and mental illness: A population-based prevalence study. JAMA 284 (20): 2606-10, 2000 Nov 22-29.11086367
Breslau N, Peterson E, Schultz L, et al.: Are smokers with alcohol disorders less likely to quit? Am J Public Health 86 (7): 985-90, 1996.8669523
Pratt LA, Brody DJ: Depression and smoking in the U.S. household population aged 20 and over, 2005-2008. NCHS Data Brief (34): 1-8, 2010.20604991
Orleans CT, Boyd NR, Bingler R, et al.: A self-help intervention for African American smokers: tailoring cancer information service counseling for a special population. Prev Med 27 (5 Pt 2): S61-70, 1998 Sep-Oct.9808825 99030559
Audrain J, Boyd NR, Roth J, et al.: Genetic susceptibility testing in smoking-cessation treatment: one-year outcomes of a randomized trial. Addict Behav 22 (6): 741-51, 1997 Nov-Dec.9426791 98088197

## Pharmacological Treatment

The following information is based on the successful use of pharmacological agents in the cessation of smoking in the general population. None of the following agents have been studied in large placebo-controlled studies in cancer patients for aid in smoking cessation. Dosage adjustments or titrations may be required when administering these agents to oncology patients. (Refer to Table 1 through Table 6 for more information.)

### Nicotine Replacement Therapies

Nicotine replacement therapies are designed to aid in the treatment of withdrawal symptoms associated with nicotine. Several precautions must be considered before therapy is initiated, but these precautions do not constitute absolute contraindications.

- Patients who are pregnant or nursing should obtain advice from a health care professional before using these products.
- Patients should be advised to not use these products if they continue to smoke, chew tobacco, use snuff, or use other nicotine-containing products.
- Patients should be instructed to consult a physician before using these products if they are younger than 18 years, have heart disease or an irregular heartbeat, have high blood pressure not controlled by medication, have a history of or currently have esophagitis or peptic-ulcer disease, use insulin for diabetes, or take prescription medications for depression or asthma.[1]

Table 1. Nicotine Inhalers

| Brand | Dose | Side Effects | Comments
Rx | Nicotrol NS | ≤40 mg/d | Local irritation | Use ≤3 months.
Rx | Nicotrol Inhaler | Individualized | Local irritation | Use ≤24 weeks.

Rx = prescription.

Table 2. Nicotine Polacrilex Gums

| Brand | Dose | Side Effects | Comments
OTC | Nicorette | 18–24 mg/d | Sore throat, stomatitis | ≤30 pieces/d; decrease 1 piece every 4–7 days.
OTC | Nicorette DS | 36–48 mg/d | Jaw ache | ≤20 pieces/d; decrease 1 piece every 4–7 days.

OTC = over the counter.

Table 3. Nicotine Lozenges

| Brand | Dose | Side Effects | Comments
OTC | Commit | 40–80 mg/d | Local irritation (warmth and tingling) | Use for 12 weeks; ≤20 lozenges/d. Weeks 1–6: 1–2 lozenges every 1–2 hours; weeks 7–9: 1 lozenge every 2–4 hours; weeks 10–12: 1 lozenge every 4–8 hours.

OTC = over the counter.

Table 4. Nicotine Patches

| Brand | Dose | Side Effects | Comments
Rx | Habitrol | 7–21 mg/d | Erythema | Use for 6–12 weeks.
OTC | NicoDerm CQ | 7–21 mg/d | Pruritus | Use for 6–12 weeks.
OTC | Nicotrol | 5–15 mg/d | Burning at site | Use for 14–20 weeks.
Rx | ProStep | 11–22 mg/d | Local irritation | Use for 6–12 weeks.

OTC = over the counter; Rx = prescription.

### Other Pharmacological Treatments

Other pharmacological treatments include agents targeting nicotine receptors (e.g., varenicline) and agents targeting neurotransmitters (e.g., bupropion HCl) involved in the pathogenesis of nicotine withdrawal and craving. Fluoxetine HCl (Prozac) has also been studied as a treatment for smoking cessation. All three of these treatments carry boxed warnings.

#### Varenicline (Chantix)

Varenicline is a nicotinic acetylcholine receptor partial agonist and the first U.S. Food and Drug Administration (FDA)–approved prescription pharmacologic agent targeted to these nicotinic receptors.[2][Level of evidence: I] Although specific mechanisms of action are unknown, it is thought that the agonist properties result in reduced craving and withdrawal by stimulating the release of dopamine and that the antagonist properties prevent inhaled nicotine from binding at the nicotinic receptor sites.[3]

At least 12 published randomized, controlled trials have evaluated varenicline versus placebo (or other approved agents for smoking cessation) for its ability to affect abstinence rates related to smoking or the use of smokeless tobacco.[2,4-14] All studies were relatively large (129–607 patients per arm) and involved multiple sites and countries. In all studies, varenicline was statistically better in achieving abstinence rates as assessed by self-report and carbon monoxide measures than was placebo, and was often better than the other approved smoking cessation comparator arm. Abstinence rates at 12 weeks can be expected to range from 44% to 49% for varenicline versus 11% to 17% for placebo; longer-term rates (52 weeks) range from 14% to 22% for varenicline versus 4% to 8% for placebo.

Most studies evaluated varenicline 1 mg twice a day, using a 1-week titration of 0.5 mg daily for 3 days, 0.5 mg twice a day for 4 days, and then 1 mg twice a day for 11 weeks. However, a few studies evaluated different doses, such as 0.3 mg or 0.5 mg daily or 0.5 mg twice a day, and one study evaluated a flexible dosing schedule during weeks 2 to 12 after all participants were titrated up to 1 mg twice a day in an open-label fashion. From these data, varenicline 0.5 mg twice a day appears to be the minimum dose required to achieve statistically significantly better abstinence rates over placebo.[9,10]

Most studies included healthy smokers, i.e., those without significant comorbidities such as cardiovascular disease or psychiatric disease. One study evaluated varenicline in patients with chronic obstructive pulmonary disease,[12] and another study focused on patients with stable cardiovascular disease.[11] However, no studies have evaluated varenicline use in cancer populations.

More than 3,000 patients in clinical trials have received varenicline 1 mg twice a day for 12 to 24 weeks. The side effect profile across these 12 studies [2,4-14] was very consistent (although incidence varied) and comprised the following:

- Nausea (13%–52%).
- Insomnia (10%–35%).
- Headache (8%–24%).
- Abnormal dreams (6%–22%).
- Dyspepsia (6%–13%).
- Constipation (7%–12%).
- Flatulence (6%–12%).
- Fatigue or somnolence (6%–10%).

Cardiovascular events often occurred as frequently in the placebo and nicotine replacement arms as in the varenicline arm and overall were rare.

Only one study evaluated varenicline in patients with stable cardiovascular disease. At week 24, this study demonstrated 7-day abstinence rates of 34.9% for varenicline versus 15.9% for placebo (P < .0001); at week 52, these rates were 27.9% for varenicline and 15.9% for placebo (P = .0001).[11] The prevalence of any adjudicated cardiovascular event was 7.1% in the varenicline arm and 5.7% in the placebo arm, for a difference of 1.4%.[11]

The dose-finding trial and package insert provide evidence that the incidence of adverse events is somewhat dose dependent.[10,15] It is not known, however, whether cardiovascular risks—in particular, in patients with cardiac comorbidities—are dose related because the study that evaluated varenicline in patients with stable cardiovascular disease studied varenicline at only the dose of 1 mg twice a day.[11] This is an area in need of investigation.

In June 2011, the FDA updated the prescribing information label for varenicline to warn that the drug may increase the risk of cardiovascular adverse events in patients who have cardiovascular disease.[16] In December 2012, the FDA updated the drug safety information for varenicline to include the results of a large meta-analysis that evaluated cardiovascular adverse events in patients who received either varenicline or placebo. Although a higher occurrence of adverse cardiovascular events that was not statistically significant was reported, there was an increased risk in patients using varenicline over those treated with placebo.[17]

In a pooled analysis of two randomized studies (N = 2,052) in which varenicline was directly tested against bupropion SR and a placebo,[3] results showed continuous abstinence rates of 44% with varenicline, 29.7% with bupropion SR, and 17.7% with placebo at weeks 9 through 12. Abstinence rates were followed through week 52 at study end, with varenicline at 22.4%, bupropion SR at 15.4%, and placebo at 9.3%. Factors found in previous studies to predict better quit rates—such as being older, being male, having a lower level of nicotine dependence, smoking fewer cigarettes at baseline, and having the first cigarette of the day at a later time—were not found to be predictive of higher quit rates in this pooled analysis.[3]

#### Bupropion hydrochloride (HCl)

Also used as an antidepressant, bupropion HCl (Zyban) is a non-nicotine aid to smoking cessation. It is a relatively weak inhibitor of the neuronal uptake of norepinephrine, serotonin, and dopamine and does not inhibit monoamine oxidase. The exact mechanism by which bupropion HCl enhances the ability of patients to abstain from smoking is unknown; however, it is presumed that this action is mediated by noradrenergic or dopaminergic mechanisms.[18] One study [19][Level of evidence: I] failed to find any additional value of bupropion HCl in reducing relapse in individuals using the nicotine patch compared with a placebo either as part of a relapse prevention program (after the end of successful patch therapy) or as a second-level treatment for individuals who were still smoking after nicotine-patch therapy.

Table 5. Varenicline and Bupropion HCl

| Brand | Dose | Side Effects | Warning/Precaution^a^
Rx | Chantix (varenicline) | 0.5 mg/d, days 1–3; 0.5 mg bid, days 4–7; then 1.0 mg bid through week 12 | Nausea, insomnia | Risk of toxicity higher in patients with impaired renal function.
Rx | Chantix (varenicline) | 0.5 mg/d, days 1–3; 0.5 mg bid, days 4–7; then 1.0 mg bid through week 12 | Nausea, insomnia | Not tested in children and pregnant women.
Rx | Zyban (bupropion HCl) | 150 mg/d × 3 days, then increase to 300 mg/d × 7–12 weeks | Insomnia, dry mouth, dizziness, rhinitis | Do not take with Wellbutrin or Wellbutrin SR.
Rx | Zyban (bupropion HCl) | 150 mg/d × 3 days, then increase to 300 mg/d × 7–12 weeks | Insomnia, dry mouth, dizziness, rhinitis | Higher incidence of seizures in patients treated for bulimia or anorexia.

bid = twice a day; HCl = hydrochloride; Rx = prescription; SR = sustained release.

^a^Clinicians need to closely monitor all patients taking varenicline and bupropion hydrochloride (HCl). The premarketing smoking cessation studies of these medications excluded patients with serious psychiatric illness (e.g., schizophrenia, bipolar disorder, and major depressive disorder), suggesting that the safety of these medications for these patients has not been investigated.[15,20] Therefore, during smoking cessation, patients with preexisting psychiatric illness who are receiving varenicline and bupropion HCl for smoking cessation need to be especially monitored.

#### Risk of neuropsychiatric events with varenicline and bupropion

There are concerns that varenicline and bupropion HCl may be associated with an increased risk of depression and other neuropsychiatric events, including suicidal behaviors.[15,21] This concern is based on postmarketing reports and post hoc analyses.[15,21] Attempted and completed suicides have also been reported in patients taking these medications.[20] These neuropsychiatric events have been reported in patients with or without preexisting psychiatric illness.

In July 2009, on the basis of the continued review of postmarketing adverse event reports, the FDA required the manufacturers of both varenicline and bupropion HCl to add a boxed warning to the product labeling.[20] The warning describes the risk of the following neuropsychiatric events from postmarketing reports:[15,20]

- Changes in mood (including depression and mania).
- Psychosis.
- Hallucinations.
- Paranoia.
- Delusions.
- Homicidal ideation.
- Hostility.
- Agitation.
- Anxiety.
- Panic.
- Suicidal ideation, suicide attempts, and completed suicides.

The warning acknowledges that nicotine withdrawal related to smoking cessation may contribute to these neuropsychiatric events. The warning also acknowledges that causality between the medication exposure and these events cannot be conclusively established and states that the risks of these medications should be weighed against the potential health benefits of quitting smoking.

#### Fluoxetine HCl

Although bupropion HCl (Zyban) is the only FDA-approved antidepressant for smoking cessation, fluoxetine HCl (Prozac) has been studied and shown to be effective in individuals with a history of depression. People with active depression were not included in the trial.[18][Level of evidence: I] However, fluoxetine HCl also carries a boxed warning describing an increased risk of suicidality in adults younger than 25 years.[22] (Refer to the Depression and Suicide section in the PDQ summary on Pediatric Supportive Care for more information.)

Table 6. Fluoxetine HCl

| Brand | Dose | Side Effects | Comments
Rx | Prozac | 30–60 mg/d | Insomnia, dizziness, anorexia, sexual dysfunction, confusion | Limited data available on use in combination with cognitive-behavioral therapy.

HCl = hydrochloride; Rx = prescription.

#### Lobeline (Bantron)

Lobeline (Bantron) is classified as a category III agent by the FDA (safe but no proven effectiveness). This product is not recommended for use in any smoking cessation program because of its lack of efficacy.[23]

### References

Fincham JE: Smoking cessation products. In: Covington TR, Berardi RR, Young LL, et al., eds.: Handbook of Nonprescription Drugs. 11th ed. Washington, DC: American Pharmaceutical Association, 1996, pp 715-723.
Tonstad S, Tønnesen P, Hajek P, et al.: Effect of maintenance therapy with varenicline on smoking cessation: a randomized controlled trial. JAMA 296 (1): 64-71, 2006.16820548
Nides M, Glover ED, Reus VI, et al.: Varenicline versus bupropion SR or placebo for smoking cessation: a pooled analysis. Am J Health Behav 32 (6): 664-75, 2008 Nov-Dec.18442345
Aubin HJ, Bobak A, Britton JR, et al.: Varenicline versus transdermal nicotine patch for smoking cessation: results from a randomised open-label trial. Thorax 63 (8): 717-24, 2008.18263663
Fagerström K, Gilljam H, Metcalfe M, et al.: Stopping smokeless tobacco with varenicline: randomised double blind placebo controlled trial. BMJ 341: c6549, 2010.21134997
Gonzales D, Rennard SI, Nides M, et al.: Varenicline, an alpha4beta2 nicotinic acetylcholine receptor partial agonist, vs sustained-release bupropion and placebo for smoking cessation: a randomized controlled trial. JAMA 296 (1): 47-55, 2006.16820546
Nakamura M, Oshima A, Fujimoto Y, et al.: Efficacy and tolerability of varenicline, an alpha4beta2 nicotinic acetylcholine receptor partial agonist, in a 12-week, randomized, placebo-controlled, dose-response study with 40-week follow-up for smoking cessation in Japanese smokers. Clin Ther 29 (6): 1040-56, 2007.17692720
Niaura R, Hays JT, Jorenby DE, et al.: The efficacy and safety of varenicline for smoking cessation using a flexible dosing strategy in adult smokers: a randomized controlled trial. Curr Med Res Opin 24 (7): 1931-41, 2008.18513462
Nides M, Oncken C, Gonzales D, et al.: Smoking cessation with varenicline, a selective alpha4beta2 nicotinic receptor partial agonist: results from a 7-week, randomized, placebo- and bupropion-controlled trial with 1-year follow-up. Arch Intern Med 166 (15): 1561-8, 2006 Aug 14-28.16908788
Oncken C, Gonzales D, Nides M, et al.: Efficacy and safety of the novel selective nicotinic acetylcholine receptor partial agonist, varenicline, for smoking cessation. Arch Intern Med 166 (15): 1571-7, 2006 Aug 14-28.16908789
Rigotti NA, Pipe AL, Benowitz NL, et al.: Efficacy and safety of varenicline for smoking cessation in patients with cardiovascular disease: a randomized trial. Circulation 121 (2): 221-9, 2010.20048210
Tashkin DP, Rennard S, Hays JT, et al.: Effects of varenicline on smoking cessation in patients with mild to moderate COPD: a randomized controlled trial. Chest 139 (3): 591-9, 2011.20864613
Tsai ST, Cho HJ, Cheng HS, et al.: A randomized, placebo-controlled trial of varenicline, a selective alpha4beta2 nicotinic acetylcholine receptor partial agonist, as a new therapy for smoking cessation in Asian smokers. Clin Ther 29 (6): 1027-39, 2007.17692719
Williams KE, Reeves KR, Billing CB Jr, et al.: A double-blind study evaluating the long-term safety of varenicline for smoking cessation. Curr Med Res Opin 23 (4): 793-801, 2007.17407636
CHANTIX (varenicline) Tablets. New York, NY: Pfizer Inc., 2013. Available online (http://labeling.pfizer.com/ShowLabeling.aspx?id=557). Last accessed June 12, 2014.
U.S. Food and Drug Administration: FDA Drug Safety Communication: Chantix (varenicline) may increase the risk of certain cardiovascular adverse events in patients with cardiovascular disease. Silver Spring, Md: U.S. Food and Drug Administration, 2011. Available online (http://www.fda.gov/Drugs/DrugSafety/ucm259161.htm). Last accessed June 12, 2014.
U.S. Food and Drug Administration: FDA Drug Safety Communication: Safety review update of Chantix (varenicline) and risk of cardiovascular adverse events. Rockville, Md: U.S. Food and Drug Administration, 2012. Available online (http://www.fda.gov/Drugs/DrugSafety/ucm330367.htm). Last accessed June 12, 2014.
Hitsman B, Pingitore R, Spring B, et al.: Antidepressant pharmacotherapy helps some cigarette smokers more than others. J Consult Clin Psychol 67 (4): 547-54, 1999.10450625 99379119
Hurt RD, Krook JE, Croghan IT, et al.: Nicotine patch therapy based on smoking rate followed by bupropion for prevention of relapse to smoking. J Clin Oncol 21 (5): 914-20, 2003.12610193
U.S. Food and Drug Administration: Information for Healthcare Professionals: Varenicline (Marketed as Chantix) and Bupropion (Marketed as Zyban, Wellbutrin, and Generics). Rockville, Md: U.S. Food and Drug Administration, 2009. Available online (http://www.fda.gov/Drugs/DrugSafety/PostmarketDrugSafetyInformationforPatientsandProviders/DrugSafetyInformationforHeathcareProfessionals/ucm169986.htm). Last accessed November 16, 2016.
Hughes JR: Smoking and suicide: a brief overview. Drug Alcohol Depend 98 (3): 169-78, 2008.18676099
U.S. Food and Drug Administration: Antidepressant Use in Children, Adolescents, and Adults. Rockville, Md: Food and Drug Administration, Center for Drug Evaluation and Research, 2007. Available online (http://www.fda.gov/Drugs/DrugSafety/InformationbyDrugClass/UCM096273). Last accessed December 29, 2015.
Drug Facts and Comparisons. St. Louis, Mo: Facts and Comparisons, 1998.

## Key Points

- Continued smoking substantially increases the likelihood of recurrence or occurrence of a second cancer in survivors, particularly in those who received radiation therapy.
- Most patients with smoking-related cancer appear motivated to quit smoking at the time of diagnosis.
- A stepped-care approach to quitting is recommended, with strong physician advice and brief counseling to quit and provision of basic information to all patients at each contact during the first month of diagnosis, followed by more intensive treatment (pharmacologic and counseling by a smoking specialist) for those having difficulty quitting or remaining abstinent.
- Patients can be carefully matched to specific smoking cessation strategies. Some smokers can quit with the help of counseling or psychological interventions, while others might need nicotine replacement therapies. Some smokers might need medications to successfully quit smoking. Given the significant health benefits derived from smoking cessation, medications can be used in these patients with careful monitoring.

## Changes to This Summary (06/20/2014)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Poorer Treatment Response in Cancer Patients

Added text to state that studies show that perioperative and long-term complications are considerably higher in patients with head and neck cancer who continue to smoke (cited Wein as reference 6).

Smoking as a Risk Factor for Second Malignancy

Added Gritz et al. and Parsons et al. as references 1 and 2, respectively.

Added text to state that studies conducted in patients with primary cancers have also shown decreased risk of second malignancy and improved survival as a result of smoking cessation (cited Chen et al. and Geyer et al. as references 13 and 14, respectively).

Effects of a Cancer Diagnosis on Quitting Smoking and Remaining Abstinent

Added text to state that despite strong evidence about the deleterious effects of continued smoking in cancer patients, smoking cessation remains a challenging issue in this patient population, especially in patients with comorbid mental health issues and substance use disorders (cited Nayan et al., Schnoll et al., and Blalock et al. as references 1, 2, and 3, respectively).

Added Duffy et al. as reference 9.

Smoking Intervention in Cancer Patients

Added text to state that other studies also suggest lower cessation rates in patients with depression and alcohol use disorders (cited Schnoll et al. as reference 2).

Pharmacological Treatment

This section has been extensively revised.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (http://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® - NCI's Comprehensive Cancer Database (http://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the risks of continued smoking in cancer patients and about quitting patterns and cessation intervention in these patients. It is intended as a resource to inform and assist clinicians who care for cancer patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (http://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewer for Smoking in Cancer Care is:

- Jean Kristeller, PhD (Indiana State University)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (http://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Smoking in Cancer Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: http://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/smoking-cessation-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389207]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (http://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (http://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (http://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (http://www.cancer.gov/contact/email-us).